# Acupuncture (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of acupuncture in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

- Acupuncture applies needles, heat, pressure, and other treatments to one or more places on the skin known as acupuncture points (see Question 1).
- Clinical trials report that acupuncture relieves nausea and vomiting from anticancer therapies (see Question 5).
- Other trials have studied the use of acupuncture in cancer treatment to relieve symptoms such as fatigue, dry mouth, and hot flashes (see Question 5).
- A strict clean needle method must be used when acupuncture treatment is given to people with cancer (see Question 6 and Question 7).

## Questions and Answers About Acupuncture

1. What is acupuncture?
  Acupuncture applies needles, heat, pressure, and other treatments to places on the skin, called acupuncture points (or acupoints), to control symptoms such as pain or nausea and vomiting. Acupuncture is part of traditional Chinese medicine (TCM).
  Acupuncture is based on the belief that qi (vital energy) flows through the body along paths, called meridians. Qi is said to affect a person's spiritual, emotional, mental, and physical health.
2. How is acupuncture given?
  Most acupuncture methods use needles. Disposable, stainless steel needles that are slightly thicker than a human hair are inserted into the skin at acupoints. The acupuncture practitioner chooses the correct acupoints for the problem being treated. The inserted needles may be twirled, moved up and down at different speeds and depths, heated, or charged with a weak electric current.
  Acupuncture methods include the following:
  - Auricular acupuncture: Acupuncture needles are placed at acupoints on the outer ear that match up with certain parts of the body. Other parts of the body used in acupuncture include scalp, face, nose, hand, wrist-ankle, and foot.
  - Electroacupuncture.
  - Trigger point acupuncture.
  - Laser acupuncture.
  - Acupuncture point injection.
  - Microwave acupuncture.
  - Acupressure.
  - Moxibustion.
  - Cupping.
3. What do people feel during acupuncture?
  People may have a needling feeling during acupuncture, known as de qi sensation, making them feel heaviness, numbness, or tingling.
4. Have any laboratory or animal studies been done using acupuncture?
  In laboratory studies, a treatment is tested in tumor samples to find out if it has any anticancer effects. In animal studies, a drug, procedure, or treatment is tested in mice or other animals to see if it is safe and effective. Laboratory and animal studies are done before a treatment is tested in people.
  Laboratory and animal studies have tested the effects of acupuncture. For information on laboratory and animal studies, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Acupuncture.
5. Have any studies been done in people?
  In 1997, the National Institutes of Health (NIH) began looking at how well acupuncture worked as a complementary therapy for cancer-related symptoms and side effects of cancer treatments. Studies of acupuncture in cancer care also have been done in China and other countries.
  - Nausea and vomiting caused by chemotherapy, surgery, and radiation therapy
    The strongest evidence for acupuncture has come from clinical trials on the use of acupuncture to relieve nausea and vomiting.
    - A 2013 review that included 41 randomized controlled trials found that acupuncture helped treat nausea and vomiting caused by chemotherapy.
    - Another review from 11 randomized clinical trials found that people receiving chemotherapy who also received acupuncture were less likely to experience acute vomiting compared to people who did not receive acupuncture.
    - A comparison of studies suggests that using specific acupuncture points may make a difference in how well acupuncture works to relieve nausea caused by chemotherapy.
    - People who received either true acupuncture or sham acupuncture were compared to people who received only standard care to prevent nausea and vomiting from radiation therapy. The study found that people in both the true and sham acupuncture groups had less nausea and vomiting than those in the standard care group.
    - In a 2016 randomized clinical trial of auricular acupressure that included 48 people with breast cancer treated with chemotherapy, people who received auricular acupressure had less intense and less frequent nausea and vomiting compared with those who did not have auricular acupressure. These findings are limited because the study had a small number of participants and no placebo group.
  - Pain
    Acupuncture has been studied to help relieve pain in people with cancer. The results are mixed due to small sample sizes and design problems.
    - Cancer pain
      Most clinical trials of acupuncture for cancer pain use conventional acupuncture methods with needles in different parts of the body.
      In one review of several small studies, acupuncture reduced cancer pain in some people with various cancers. Another review concluded acupuncture with pain medicine worked better than the pain medicine alone. This review was limited by poor quality of clinical trials.
      A 2020 clinical trial to treat cancer pain showed that the combination of wrist-ankle acupuncture and auricular acupuncture was effective in reducing pain and use of pain medication. The study was limited by small size, lack of a placebo group, and short follow up.
    - Postoperative pain
      In several randomized clinical trials on pain after surgery, acupuncture reduced pain, but sample sizes were small and additional treatments were unknown. Some studies reported that pain decreased even more when acupuncture was used with standard care.
      In two randomized clinical trials in people who had a bone marrow aspiration and biopsy, acupressure was found to relieve pain and anxiety compared to sham acupressure.
    - Muscle and joint pain from aromatase inhibitors
      Aromatase inhibitors, a type of hormone therapy for postmenopausal women who have hormone-dependent breast cancer, may cause muscle and joint pain.
      - Five randomized controlled trials compared the effects of real and sham acupuncture in reducing pain. All five trials showed no side effects from either real acupuncture or sham acupuncture. Two trials showed real acupuncture was better than sham acupuncture in relieving joint and muscle pain, but the other three trials did not.
      - Observational studies have also reported both real acupuncture and sham acupuncture may relieve pain more than standard care.
      - A review of 17,922 people with cancer reported that real acupuncture relieved pain better than sham acupuncture.
    - Muscle and joint pain in cancer survivors
      In a 2021 randomized clinical trial that included 360 cancer survivors with muscle and joint pain, people reported better pain relief from acupuncture compared to standard care.
    - Chemotherapy-induced peripheral neuropathy
      Peripheral neuropathy is a common side effect of chemotherapy that can cause pain, paresthesia, sensory loss, and muscle weakness. These symptoms can cause a person to delay or end treatment. Chemotherapy-induced peripheral neuropathy (CIPN) can affect quality of life and may last long after chemotherapy has ended.
      The current standard of care for CIPN is symptom management such as narcotics and antidepressants. However, treatment may not relieve all of the pain, and it can cause dizziness, sedation, dry mouth, and constipation.
      Some randomized clinical trials of acupuncture have shown promise in treating CIPN. More evidence is needed to explore how acupuncture may relieve symptoms of CIPN and to find out which people may benefit most from acupuncture. For more information about these studies, see the Acupuncture to treat persistent CIPN from taxane or platinum-based chemotherapy section of the health professional version of Acupuncture.
  - Hot flashes
    Hormone therapy may cause hot flashes in women with breast cancer and men with prostate cancer. Studies of the use of acupuncture to relieve hot flashes have shown mixed results.
    - Six randomized clinical trials studied the use of acupuncture to prevent hot flashes in breast cancer survivors. These trials found that acupuncture was safe and decreased hot flashes. It was not clear whether real acupuncture worked better than sham acupuncture.
    - A 2015 randomized trial of electroacupuncture in breast cancer survivors with hot flashes had four groups for treatment: electroacupuncture, sham acupuncture, gabapentin, and placebo. The trial looked at how well sham acupuncture worked compared to the placebo and compared hot flash relief in all groups. The study found that sham acupuncture worked better than gabapentin or the placebo, and both electroacupuncture and sham acupuncture gave better relief than gabapentin.
    - A 2016 randomized trial compared acupuncture plus self-care (as described in an information booklet provided to all patients) to self-care alone in breast cancer survivors. The study found that adding acupuncture reduced hot flashes after 12 weeks of treatment and at the 3- and 6-month follow-up visits. The study also found that acupuncture improved the participants' quality of life.
    - A 2016 review of 12 randomized trials in breast cancer survivors with hot flashes included six studies that compared real acupuncture with sham acupuncture. Of these, only two studies found that real acupuncture had a benefit compared with the sham treatment. The other studies found that acupuncture was no better than hormone therapy, venlafaxine, or relaxation therapy in relieving hot flashes.
    - Some studies have reported that acupuncture may relieve hot flashes in people with prostate cancer who are on androgen-deprivation therapy.
  - Fatigue
    Fatigue is a common symptom in people with cancer and a frequent side effect of chemotherapy and radiation therapy.
    - Several randomized clinical trials have studied the use of acupuncture in reducing cancer-related fatigue. These trials found that acupuncture improved fatigue when compared to standard care alone. It is not clear whether real acupuncture works better than sham acupuncture.
    - A 2016 randomized clinical trial of 78 cancer survivors with cancer-related fatigue showed that infrared laser acupuncture used on certain acupoints was safe. People who received infrared laser acupuncture three times per week for 4 weeks had less fatigue than those who received sham treatment.
    - A 2016 randomized clinical trial of 288 breast cancer survivors with fatigue that wouldn't go away showed that two types of acupressure (relaxing and stimulating) significantly reduced cancer-related fatigue.
  - Dry mouth (xerostomia)
    Several clinical trials have studied the effect of acupuncture in the treatment and prevention of dry mouth caused by radiation therapy in people with nasopharyngeal carcinoma and head and neck cancer.
    - In studies that compared acupuncture with standard care for preventing dry mouth in people receiving radiation therapy, people receiving acupuncture had fewer dry mouth symptoms and better saliva flow.
    - Two randomized controlled trials compared real and sham acupuncture for the prevention and treatment of dry mouth. These trials found that both real and sham acupuncture increased the flow of saliva.
    - A study on the long-term effects of acupuncture on dry mouth found that people had better saliva flow 6 months after receiving acupuncture treatment than before they began acupuncture treatment. People who received additional acupuncture had more saliva flow at 3 years compared to people who did not continue acupuncture treatment.
    One phase III clinical trial with sites in the United States and China studied 339 people with head and neck cancer who received true acupuncture, sham acupuncture, or standard care while receiving radiation therapy. Acupuncture was given three times per week during a 6- to 7-week course of radiation therapy. The dry mouth score reduction at 1 year was greater in the true acupuncture group than in the standard care group, but only slightly different from the sham acupuncture group. An additional phase III clinical trial is in progress to study the role of acupuncture for the treatment of dry mouth in people with head and neck cancer.
    Other trials are ongoing.
  - Lymphedema
    There have been a number of case reports and studies that show acupuncture is safe and may decrease swelling and relieve symptoms in people with lymphedema in the arms and legs.
    - In one randomized clinical trial, acupuncture may have kept lymphedema from getting worse but did not decrease swelling or symptoms.
    - In a 2016 study, acupuncture along with moxibustion treatments were shown to increase energy levels and decrease pain in 23 people with breast or head and neck cancer and lymphedema.
    - In a 2016 randomized clinical trial that included 30 people with breast cancer and lymphedema, warm acupuncture (acupuncture and moxibustion) improved lymphedema symptoms for some participants. However, a small portion of people who did not receive warm acupuncture also had improved symptoms. People who received warm acupuncture also had improved shoulder joint range of motion and quality of life compared to those who did not receive warm acupuncture.
    - A randomized clinical trial that included 82 people with breast cancer and lymphedema found that those who received acupuncture had no change in lymphedema symptoms compared to those who did not receive acupuncture.
  - Ileus
    After cancer surgery, some people develop ileus. Randomized clinical trials that studied acupuncture for ileus had mixed results.
    A 2023 randomized clinical trial of 249 patients in China compared electroacupuncture with sham acupuncture in people who underwent laparoscopic surgery for colon cancer. The study reported that the average time to recover bowel function was shorter in the electroacupuncture group compared with the sham acupuncture group. Electroacupuncture after laparoscopic colon cancer surgery was reported to be safe and effective in reducing postoperative ileus.
  - Anxiety
    A randomized clinical trial that included 141 people studied the effect of acupuncture on relieving anxiety in people undergoing surgery. Participants received either standard care for relieving anxiety or acupuncture before surgery, during surgery, or both combined. Acupuncture before surgery relieved anxiety for people waiting for their surgery to begin. Acupuncture before and during surgery combined were most effective in improving quality of life after surgery. Because there was no group that received sham acupuncture as a placebo, future studies are needed to find out if acupuncture is useful for anxiety.
    A randomized clinical trial published in 2013 studied cancer-related fatigue in 246 patients. Participants reported that acupuncture reduced fatigue, anxiety, and depression, and improved quality of life when compared with standard care.
    An analysis of a larger study showed that acupressure was linked to decreased anxiety and pain and fewer symptoms of depression when compared with standard care.
  - Sleep problems
    Studies have shown that acupuncture may help relieve sleep problems.
    - A 2019 randomized controlled trial of cancer survivors found that acupuncture reduced the severity of insomnia.
    - A 2014 study found that acupuncture improved sleep slightly more than standard care.
    - A 2011 study that compared acupuncture with fluoxetine found that acupuncture worked better in relieving depression and improving sleep.
  - The immune system
    Studies that suggest acupuncture may improve the immune system are limited.
  - Other symptoms of cancer and side effects of cancer treatment
    Other clinical trials in people with cancer have studied the effects of acupuncture on cancer symptoms and side effects caused by cancer treatment, including weight loss, cough, coughing up blood, fever, depression, proctitis, speech problems, blocked esophagus, chemotherapy-related cognitive problems, and hiccups. A randomized study of acupressure in managing opioid-induced constipation suggested that it helped to improve quality of life and reduce symptoms. Studies have shown that treatment with acupuncture either relieves symptoms or keeps them from getting worse.
  - Acupuncture in children with cancer
    Few studies have examined the effects of acupuncture in children with cancer. In a study of 80 participants, the acceptance rate for acupuncture was 82% in children, adolescents, and young adults who were having a hematopoietic stem cell transplant.
    Adverse effects of acupuncture in children appear to be rare and similar to the same effects found in adults. One study in children who received acupuncture showed that there was no higher rate of adverse effects in those with cancer-related thrombocytopenia or neutropenia.
6. Have any side effects or risks been reported from acupuncture?
  There have been few complications reported. Problems may arise from using needles that are not sterile, placing the needle in the wrong place, movement of the person receiving acupuncture, or a defect in the needle.
  Side effects include the following:
  - Soreness and pain during treatment.
  - Feeling tired, lightheaded, or sleepy.
  - Getting an infection.
  A strict clean needle method must be used when acupuncture treatment is given to people with cancer, because chemotherapy and radiation therapy weaken the body's immune system.
7. Is acupuncture approved by the US Food and Drug Administration (FDA)?
  The FDA approved acupuncture needles for use by licensed practitioners in 1996. The FDA requires that sterile needles be used and labeled for single use by qualified practitioners only.
  More than 40 states and the District of Columbia have laws about acupuncture practice. The National Certification Commission for Acupuncture and Oriental Medicine (www.nccaom.org) certifies practitioners of acupuncture and traditional Chinese medicine (TCM). Most states require this certification.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of acupuncture in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Acupuncture. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/acupuncture-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389264]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov